# Genetics of Hereditary Hematologic Malignancies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of hereditary hematologic malignancies. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Inherited predisposition syndromes that lead to hereditary hematologic malignancy (HHM) are increasingly being recognized.[1-4] These syndromes were originally thought to be rare. However, recent estimates suggest that more than 10% of all hematologic malignancies (HM) may have an inherited component. The presentations of HHM syndromes occur on a spectrum. They can occur during childhood with conditions like inherited bone marrow failure syndromes, or they can occur in adulthood with conditions like DDX41-associated myeloid cancers, in which malignancy occurs at a median age of 68 years. Updated guidelines for the diagnosis and treatment of HMs (i.e., the World Health Organization, International Consensus Classification of Myeloid Neoplasms and Acute Leukemias [ICC], and European LeukemiaNet [ELN] guidelines) now include genetic testing considerations for HHM. Genetic testing for HHM is often challenging because it can be difficult to obtain a normal germline control tissue sample, such as a skin biopsy, to confirm the hereditary nature of a predisposing pathogenic variant. Allogeneic hematopoietic stem cell transplant (HSCT) is a curative treatment for many HMs. However, timely diagnosis of an HHM is essential for evaluation and management. Timely diagnosis allows for the identification of optimal transplant donors who are related to the patient (i.e., family members who are HSCT matches but do not have the same HHM), the selection of appropriate cytoreductive therapy, and the transplant conditioning regimen.

### References

Arber DA, Orazi A, Hasserjian RP, et al.: International Consensus Classification of Myeloid Neoplasms and Acute Leukemias: integrating morphologic, clinical, and genomic data. Blood 140 (11): 1200-1228, 2022.35767897
Döhner H, Wei AH, Appelbaum FR, et al.: Diagnosis and management of AML in adults: 2022 recommendations from an international expert panel on behalf of the ELN. Blood 140 (12): 1345-1377, 2022.35797463
Arber DA, Orazi A, Hasserjian R, et al.: The 2016 revision to the World Health Organization classification of myeloid neoplasms and acute leukemia. Blood 127 (20): 2391-405, 2016.27069254
Sahoo SS, Kozyra EJ, Wlodarski MW: Germline predisposition in myeloid neoplasms: Unique genetic and clinical features of GATA2 deficiency and SAMD9/SAMD9L syndromes. Best Pract Res Clin Haematol 33 (3): 101197, 2020.33038986

## Natural History of Hereditary Hematologic Malignancies

Since germline hematologic malignancy (HM) syndromes are rare and heterogenous, data on their natural histories are scarce. Initial hematologic manifestations in hereditary hematologic malignancy (HHM) syndromes can range from thrombocytopenia (in RUNX1-, ETV6-, ANKRD26-, and MECOM-associated syndromes), leukopenia and monocytopenia (in GATA2 deficiency syndrome), multilineage cytopenia (in classical inherited bone marrow failure syndromes), and B-cell or natural killer cell lymphopenias (caused by pathogenic variants in several different genes).[1-9] The progression from initial hematologic manifestations to an HM is typically gradual, with varying latency periods occurring from birth to leukemia development. Many patients exhibit dysplasia in the bone marrow or clonal genetic/cytogenetic aberrations, which can eventually lead to HMs.

In some pathogenic variant carriers of HHM syndromes, initial manifestations may include extra-hematopoietic abnormalities, such as the following:

- Constitutional and congenital defects (i.e., intrauterine growth restriction; failure to thrive; and skeletal, cardiac, urogenital, mucocutaneous, vascular, or neurological abnormalities).
- Increased sensitivity to chemotherapy (manifests as delayed blood count recovery or increased toxicity).
- Atypical systemic infections.
- Increased risk of solid tumors.

Complications of infection and malignancy risk increase with patient age and are the main causes of mortality in this population. These factors must be considered when selecting management strategies, which can include watchful waiting, supportive care, or curative hematopoietic stem cell transplant.

Various disease aspects are gene- or variant-specific, including risks to develop HMs and the heterogenous spectrum of acquired events that can occur (which may include cytogenic changes, leukemia driver variants and somatic genetic rescue events during hematopoiesis). However, the natural histories of these syndromes are often unpredictable, with identical pathogenic variants resulting in both indolent or rapidly progressing disease in different individuals. These differences are likely due to unknown disease-modifying factors.

### References

Alter BP, Giri N, Savage SA, et al.: Malignancies and survival patterns in the National Cancer Institute inherited bone marrow failure syndromes cohort study. Br J Haematol 150 (2): 179-88, 2010.20507306
Tamary H, Nishri D, Yacobovich J, et al.: Frequency and natural history of inherited bone marrow failure syndromes: the Israeli Inherited Bone Marrow Failure Registry. Haematologica 95 (8): 1300-7, 2010.20435624
Niewisch MR, Giri N, McReynolds LJ, et al.: Disease progression and clinical outcomes in telomere biology disorders. Blood 139 (12): 1807-1819, 2022.34852175
Brown AL, Hahn CN, Scott HS: Secondary leukemia in patients with germline transcription factor mutations (RUNX1, GATA2, CEBPA). Blood 136 (1): 24-35, 2020.32430494
Dutzmann CM, Spix C, Popp I, et al.: Cancer in Children With Fanconi Anemia and Ataxia-Telangiectasia-A Nationwide Register-Based Cohort Study in Germany. J Clin Oncol 40 (1): 32-39, 2022.34597127
Da Costa L, O'Donohue MF, van Dooijeweert B, et al.: Molecular approaches to diagnose Diamond-Blackfan anemia: The EuroDBA experience. Eur J Med Genet 61 (11): 664-673, 2018.29081386
Myers KC, Furutani E, Weller E, et al.: Clinical features and outcomes of patients with Shwachman-Diamond syndrome and myelodysplastic syndrome or acute myeloid leukaemia: a multicentre, retrospective, cohort study. Lancet Haematol 7 (3): e238-e246, 2020.31879230
Rotulo GA, Beaupain B, Rialland F, et al.: HSCT may lower leukemia risk in ELANE neutropenia: a before-after study from the French Severe Congenital Neutropenia Registry. Bone Marrow Transplant 55 (8): 1614-1622, 2020.31992846
Rosenberg PS, Zeidler C, Bolyard AA, et al.: Stable long-term risk of leukaemia in patients with severe congenital neutropenia maintained on G-CSF therapy. Br J Haematol 150 (2): 196-9, 2010.20456363

## Risk Factors for Hereditary Hematologic Malignancies

Several environmental, occupational, and iatrogenic exposures increase the risk of developing hematologic malignancies (HMs) in the general population. These factors likely further increase risk in individuals with a germline predisposition to HM, although the precise interactions between these exposures and germline hereditary hematologic malignancies (HHMs) are not well known. For more information about risk factors for HMs in the general population, see the Risk Factors section in Myelodysplastic Syndromes Treatment.

Examples of exposures that increase risk for HMs include benzene (and other organic solvents), pesticides, radiation, and chemotherapy.[1,2] The latency period between initial exposure and diagnosis of a secondary HM is 2 to 3 years for patients who were exposed to topoisomerase II inhibitors and 5 to 7 years for those who were exposed to alkylating agents or radiation therapy.

Patients with DNA repair disorders, like Fanconi anemia, have very high risks of developing secondary malignancies after radiation or chemotherapy, and these malignancies often progress rapidly.[3] Patients with germline RUNX1 and CEBPA pathogenic variants who are treated for acute myeloid leukemia (AML) have very high rates of relapse and AML recurrence after initial rounds of chemotherapy.[4] A family history of HMs (even in the absence of a known, single-gene Mendelian hereditary predisposition) significantly increases an individual's risk of developing an HM.[5] This increase is likely caused by shared genetic and environmental risk factors.

### References

Patel AA, Rojek AE, Drazer MW, et al.: Therapy-related myeloid neoplasms in 109 patients after radiation monotherapy. Blood Adv 5 (20): 4140-4148, 2021.34492705
Morton LM, Dores GM, Schonfeld SJ, et al.: Association of Chemotherapy for Solid Tumors With Development of Therapy-Related Myelodysplastic Syndrome or Acute Myeloid Leukemia in the Modern Era. JAMA Oncol 5 (3): 318-325, 2019.30570657
Alter BP, Giri N, Savage SA, et al.: Malignancies and survival patterns in the National Cancer Institute inherited bone marrow failure syndromes cohort study. Br J Haematol 150 (2): 179-88, 2010.20507306
Brown AL, Hahn CN, Scott HS: Secondary leukemia in patients with germline transcription factor mutations (RUNX1, GATA2, CEBPA). Blood 136 (1): 24-35, 2020.32430494
Sud A, Chattopadhyay S, Thomsen H, et al.: Analysis of 153 115 patients with hematological malignancies refines the spectrum of familial risk. Blood 134 (12): 960-969, 2019.31395603

## Prevalence of Hereditary Hematologic Malignancies

The prevalence of germline predisposition syndromes is increasingly being recognized in individuals with hematologic malignancies (HM). The prevalence of these predisposition syndromes continues to be studied and defined. It varies widely depending on the patient’s clinical diagnosis, age, and family history. A germline predisposition is estimated to underlie 10% to 20% of HM cases across the lifespan.[1-11] Studies of pediatric HM/bone marrow failure (BMF) cohorts suggest that 10% to 30% of diagnoses are caused by underlying germline pathogenic variants, typically in genes like SAMD9, SAMD9L, GATA2, genes in the Fanconi anemia pathway, and genes involved in telomere biology. The prevalence of inherited predisposition syndromes in adult-onset HM/BMF is less understood, but evidence is growing as genetic testing is offered to a growing number of affected individuals. Recent studies imply that approximately 10% to 20% of familial myeloid malignancies, like acute myeloid leukemia and myelodysplastic syndrome (MDS), are inherited. Furthermore, it is becoming increasingly common to diagnose a BMF syndrome (typically with pediatric onset), such as Fanconi anemia or a telomere biology disorder, in an adult whose personal and family history may not align with conventional descriptions of the phenotype.

Importantly, somatic testing (which is routinely performed on individuals with HMs), may detect pathogenic variants that originate in the germline. Additionally, several genomic features are pathognomonic for certain germline pathogenic variants associated with hereditary hematologic malignancies (HHMs). In one study, 94% (33/35) of patients with somatic DDX41 variants that exceeded a 40% variant allele frequency harbored a germline DDX41 pathogenic variant.[12] When a DDX41 p.R525H variant presented in trans with another DDX41 variant, it was especially indicative of a germline DDX41 pathogenic variant. Another study of pediatric (<18 y) MDS showed that 8% of patients carried a germline SAMD9/9L pathogenic variant, and 7% (38/548) carried a germline GATA2 pathogenic variant.[10] In contrast, many of the genes implicated in inherited HM predisposition may also acquire somatic pathogenic variants, which can be detected in the bone marrow or peripheral blood at varying allele frequencies. Follow-up germline evaluation can be helpful to discern the genomic origin of these pathogenic variants. The understanding of somatic and germline variants in HM and the way that these variants interact is expected to evolve since several studies on this topic are ongoing.

### References

Bluteau O, Sebert M, Leblanc T, et al.: A landscape of germ line mutations in a cohort of inherited bone marrow failure patients. Blood 131 (7): 717-732, 2018.29146883
Feurstein S, Trottier AM, Estrada-Merly N, et al.: Germ line predisposition variants occur in myelodysplastic syndrome patients of all ages. Blood 140 (24): 2533-2548, 2022.35969835
Douglas SPM, Lahtinen AK, Koski JR, et al.: Enrichment of cancer-predisposing germline variants in adult and pediatric patients with acute lymphoblastic leukemia. Sci Rep 12 (1): 10670, 2022.35739278
Lahtinen AK, Koski J, Ritari J, et al.: Clinically relevant germline variants in allogeneic hematopoietic stem cell transplant recipients. Bone Marrow Transplant 58 (1): 39-45, 2023.36195768
Singhal D, Hahn CN, Feurstein S, et al.: Targeted gene panels identify a high frequency of pathogenic germline variants in patients diagnosed with a hematological malignancy and at least one other independent cancer. Leukemia 35 (11): 3245-3256, 2021.33850299
DiNardo CD, Bannon SA, Routbort M, et al.: Evaluation of Patients and Families With Concern for Predispositions to Hematologic Malignancies Within the Hereditary Hematologic Malignancy Clinic (HHMC). Clin Lymphoma Myeloma Leuk 16 (7): 417-428.e2, 2016.27210295
Churpek JE, Pyrtel K, Kanchi KL, et al.: Genomic analysis of germ line and somatic variants in familial myelodysplasia/acute myeloid leukemia. Blood 126 (22): 2484-90, 2015.26492932
Holme H, Hossain U, Kirwan M, et al.: Marked genetic heterogeneity in familial myelodysplasia/acute myeloid leukaemia. Br J Haematol 158 (2): 242-248, 2012.22533337
Lindsley RC, Saber W, Mar BG, et al.: Prognostic Mutations in Myelodysplastic Syndrome after Stem-Cell Transplantation. N Engl J Med 376 (6): 536-547, 2017.28177873
Sahoo SS, Pastor VB, Goodings C, et al.: Clinical evolution, genetic landscape and trajectories of clonal hematopoiesis in SAMD9/SAMD9L syndromes. Nat Med 27 (10): 1806-1817, 2021.34621053
Kim B, Yun W, Lee ST, et al.: Prevalence and clinical implications of germline predisposition gene mutations in patients with acute myeloid leukemia. Sci Rep 10 (1): 14297, 2020.32868804
Bannon SA, Routbort MJ, Montalban-Bravo G, et al.: Next-Generation Sequencing of DDX41 in Myeloid Neoplasms Leads to Increased Detection of Germline Alterations. Front Oncol 10: 582213, 2020.33585199

## Risk Assessment and Genetic Testing for Hereditary Hematologic Malignancies

### Considerations for Risk Assessment and Identification of Individuals at Risk for Hereditary Hematologic Malignancies (HHM)

It is recommended that thorough personal and family histories be obtained for all patients who present with hematologic malignancies (HMs).[1] Some disorders are associated with specific hematologic or nonhematologic disease manifestations. For example, germline RUNX1, ETV6, and ANRKD26 pathogenic variants are associated with lifelong mild- to moderate-thrombocytopenia and qualitative platelet deficits. Other germline pathogenic variants, like those in GATA2, SAMD9, and SAMD9L, are associated with immunodeficiency and frequent infections. For more information about cancer genetics risk assessment and genetic counseling, see Cancer Genetics Risk Assessment and Counseling.

The absence of a family history of HMs does not preclude the need for genetic testing since a hereditary predisposition to HMs can occur de novo, and some HHMs exhibit only mild to moderate penetrance. While an HM diagnosis at a young age can raise suspicion for an HHM, an older age at diagnosis does not eliminate the need for genetic testing, since some HHMs (i.e., DDX41) typically present in older patients, with a median age of HM onset in the mid-60s.

### Indications for Genetic Testing

Since phenotypes for HHM have become better defined, indications for germline genetic evaluation have emerged. National and international guideline-issuing bodies (National Comprehensive Cancer Network [NCCN], International Consensus Classification [ICC], World Health Organization [WHO], and European LeukemiaNet [ELN]) recently updated their guidelines to include recognition of HHM.[2-4]

When evaluating patients, key factors that prompt consideration of germline genetic testing include the following:[1]

- A personal history of a hematologic disease or malignancy.
- A family history of hematologic disease, early-onset cancers, or treatment-related toxicities.
- A personal or family history of malignancy characteristics such as early-onset cancers or an HM with atypical features.

Despite meeting clinical indications for HHM genetic testing, referral for genetic evaluation remains inconsistent.[5] Therefore, unbiased, expansive germline genetic panel testing is emerging as a key diagnostic tool to identify hereditary HM predisposition, thanks to increased availability of multigene panels, accessible genetic counseling, and growing awareness.[6]

### Technical Aspects of Genetic Testing for HHM

Accurate identification of an underlying HHM is achieved by testing DNA from nonhematopoietic germline cells. In individuals without HMs, germline DNA (for genetic testing) is typically obtained from blood, saliva, or buccal swabs. However, in those with HMs, white blood cells (which are present in the saliva and buccal swabs) harbor somatic variants that can confound interpretation of germline genetic test results.[7] Somatic variants acquired in hematopoietic cells can occur in genes that also cause HHM, like RUNX1, CEBPA, GATA2, and TP53, making it difficult to discriminate between germline and somatic variants.[8] Variants detected via somatic testing (i.e., on myeloid malignancy panels) may identify germline pathogenic variants, but these panels are not substitutes for germline genetic testing.

Obtaining true germline DNA is critical when evaluating patients for HHM. Cultured skin fibroblasts (collected via punch biopsies) are the most common germline DNA source for HHM genetic testing.[1] Other options, like fingernail clippings or hair follicles, are not widely available. It may take 6 to 8 weeks to receive genetic test results when using these sample types. Therefore, it is important that patients be referred to genetics in a timely manner to inform therapeutic decision making and the donor selection process for hematopoietic stem cell transplant (HSCT). For individuals who have received allogeneic HSCT, their blood and buccal swab samples contain their donor’s DNA.[9] Therefore, cultured fibroblasts may be needed to determine the germline statuses of these individuals.

Standard methodological approaches for HHM genetic testing include the following:

- Multigene next-generation sequencing (NGS) panels: These panels use NGS to analyze a set of genes that are associated with HHM and HHM-related disorders.
- Single nucleotide polymorphism (SNP) microarray analysis: SNP arrays detect copy number variations and regions with loss of heterozygosity (LOH), which are often indicative of clonal hematopoiesis and can be associated with a specific HHM.
- Whole exome sequencing (WES) and whole genome sequencing (WGS): WES and WGS provide sequencing of the entire protein-coding region (exome) or full genome, respectively. These approaches allow analysis of virtual gene panels (different panels can be applied to the full sequencing data to analyze specific subsets of genes) from full sequencing data and unbiased analysis across all genes. WES and WGS can also enable detection of LOH through bioinformatic algorithms.

The optimal genetic testing approach depends on the patient's clinical presentation and local genetic testing resources. WES and WGS are emerging as a standards since they can reanalyze data over time as new genetic associations are reported. Consultations with genetic counselors help guide the patient’s genetic testing strategy.

### References

DiNardo CD, Bannon SA, Routbort M, et al.: Evaluation of Patients and Families With Concern for Predispositions to Hematologic Malignancies Within the Hereditary Hematologic Malignancy Clinic (HHMC). Clin Lymphoma Myeloma Leuk 16 (7): 417-428.e2, 2016.27210295
Arber DA, Orazi A, Hasserjian RP, et al.: International Consensus Classification of Myeloid Neoplasms and Acute Leukemias: integrating morphologic, clinical, and genomic data. Blood 140 (11): 1200-1228, 2022.35767897
Döhner H, Wei AH, Appelbaum FR, et al.: Diagnosis and management of AML in adults: 2022 recommendations from an international expert panel on behalf of the ELN. Blood 140 (12): 1345-1377, 2022.35797463
Arber DA, Orazi A, Hasserjian R, et al.: The 2016 revision to the World Health Organization classification of myeloid neoplasms and acute leukemia. Blood 127 (20): 2391-405, 2016.27069254
Clifford M, Bannon S, Bednar EM, et al.: Clinical applicability of proposed algorithm for identifying individuals at risk for hereditary hematologic malignancies. Leuk Lymphoma 60 (12): 3020-3027, 2019.31274040
Roloff GW, Godley LA, Drazer MW: Assessment of technical heterogeneity among diagnostic tests to detect germline risk variants for hematopoietic malignancies. Genet Med 23 (1): 211-214, 2021.32807974
Hamilton KV, Fox LC, Nichols KE: How I communicate with patients and families about germ line genetic information. Blood 141 (26): 3143-3152, 2023.37023453
Drazer MW, Kadri S, Sukhanova M, et al.: Prognostic tumor sequencing panels frequently identify germ line variants associated with hereditary hematopoietic malignancies. Blood Adv 2 (2): 146-150, 2018.29365323
Imanishi D, Miyazaki Y, Yamasaki R, et al.: Donor-derived DNA in fingernails among recipients of allogeneic hematopoietic stem-cell transplants. Blood 110 (7): 2231-4, 2007.17557896

## Genes Associated with Hereditary Hematologic Malignancies

All described inherited predispositions to hematologic malignancies follow well-defined Mendelian inheritance patterns: autosomal dominant, autosomal recessive, and X-linked. Penetrance varies depending on the hereditary hematologic malignancy (HHM).

Table 1. Classical Bone Marrow Failure Syndromes That Predispose to Myeloid Malignancies and Myeloproliferative Disorders

Syndrome [1,2] | Gene | Inheritance | Associated Hematologic Malignancies | Clinical Characteristics | Standard Age at HM Presentation
Fanconi anemia | At least 21 genes have been identified;^1^ FANCA, FANCC, and FANCG are the most common | AR, X-linked | MDS/AML, aplastic anemia | Short stature, café au lait macules, skeletal malformations, microcephaly, squamous cell carcinomas, DEB, or abnormal MMC assay | Presents more often in childhood than in adulthood
Severe congenital neutropenia | ELANE, CLPB, G6PC3, HAX1, CXCR4, SRP54, CSF3R, GFI1 | AD | MDS/AML | Congenital malformations | Adolescents and young adults
Shwachman-Diamond syndrome | SBDS, ELF1, SRP54, DNACJ21 | AR | MDS/AML | Congenital malformations | Presents more often in childhood than in adulthood
Diamond-Blackfan anemia | At least 28 genes have been identified;^2^ RPS19, RPL5, RPL11, and RPS26 are the most common | AD | MDS/AML | Pure red cell aplasia, congenital malformations, growth delay | Presents more often in childhood than in adulthood
Telomere biology disorders | At least 20 genes have been identified;^3^ TERT, RTEL1, TERC, and DKC1 are the most common | AD, AR, X-linked | MDS/AML, aplastic anemia | Macrocytosis, bone marrow failure, squamous cell cancers, head and neck cancers, anal/rectal cancers | Wide age range
MECOM-related bone marrow failure | MECOM | AR | MDS (rare) | Congenital malformations | Presents more often in childhood than in adulthood

AD = autosomal dominant; AML = acute myeloid leukemia; AR = autosomal recessive; DEB = dystrophic epidermolysis bullosa; HHM = hereditary hematologic malignancies; MDS = myelodysplastic syndrome; MMC = mitomycin C.

^1^Reported Fanconi anemia genes: BRCA1, BRCA2, BRIP1, ERCC4, FANCA, FANCB, FANCC, FANCD2, FANCE, FANCF, FANCG, FANCI, FANCL, FANCM, MAD2L2,[3] PALB2, RAD51, RAD51C, SLX4, UBE2T, XRCC2.[4]

^2^Reported Diamond-Blackfan anemia genes: RPL3, RPL5, RPL9, RPL11, RPL15, RPL18,[5] RPL19, RPL26, RPL27, RPL31, RPL35,[5] RPL35A, RPL37, RPLP0, RPS7, RPS10, RPS15A, RPS17, RPS19, RPS20, RPS24, RPS26, RPS27, RPS28, RPS29, TSR2, GATA1, HEATR3.[6]

^3^Reported telomere biology disorder genes: ACD, CTC1, DKC1, MDM4,[7] NAF1, NHP2, NOP10, NPM1, PARN, POT1 (long telomeres), RPA1, RTEL1, TERC, TERT, TINF2, USB1, WRAP53, APOLLO,[8] ENOSF1, TYMS.

Table 2. Other Hereditary Syndromes That Predispose to Primarily Myeloid Malignancies and Myeloproliferative Disorders

Syndrome [1,2,9] | Gene | Inheritance | Associated Hematologic Malignancies | Clinical Characteristics | Standard Age at HM Presentation
RUNX1-familial platelet disorder | RUNX1 | AD | MDS/AML/T-cell ALL | Thrombocytopenia, bleeding propensity, aspirin-like platelet dysfunction | Wide age range
Thrombocytopenia 2 | ANKRD26 | AD | MDS/AML/lymphatic neoplasia | Thrombocytopenia, bleeding propensity | Presents more often in adulthood than in childhood
Thrombocytopenia 5 | ETV6 | AD | MDS/AML, CMML, B-cell ALL, multiple myeloma, aplastic anemia | Thrombocytopenia | Wide age range
CEBPA-associated familial acute myeloid leukemia | CEBPA | AD | AML | None | Wide age range
DDX41-associated myeloid malignancies | DDX41 | AD | MDS/AML, CMML | None, late onset at diagnosis | Presents more often in adulthood than in childhood
GATA2 deficiency syndrome | GATA2 | AD | MDS/AML, CMML | Neutropenia, monocytopenia, atypical infections, lymphedema, hearing loss, autism | Adolescents and young adults
SAMD9- and SAMD9L-related disorders | SAMD9, SAMD9L | AD | Monosomy 7, MDS/AML | SAMD9: endocrine and urogenital issues; SAMD9L: ataxia, neuropathy | Presents more often in childhood than in adulthood
Familial AML with a MBD4 variant | MBD4 | AR | DNMT3A-mutated AML | None | Presents more often in adulthood than in childhood
Familial aplastic anemia with a SRP72 variant | SRP72 | AD | MDS, aplastic anemia | None | Wide age range
RASopathies | NF1, CBL, PTPN11, and others | AD | JMML, myeloproliferation | Congenital malformations | Childhood
Trisomy 21–related acute leukemias | Trisomy 21 | N/A | ALL, AML-M7 | Typical clinical presentation associated with trisomy 21 | Childhood
ERCC6L2 deficiency | ERCC6L2 | AR | MDS, pure erythroid leukemia | Acquisition of TP53 mutations at leukemic stage [10] | Childhood and young adults

AD = autosomal dominant; ALL = acute lymphoblastic leukemia; AML = acute myeloid leukemia; AR = autosomal recessive; CMML = chronic myelomonocytic leukemia; HHM = hereditary hematologic malignancies; JMML = juvenile myelomonocytic leukemia; MDS = myelodysplastic syndrome; N/A = not applicable.

Table 3. Hereditary Syndromes That Predispose to Primarily Lymphoid Malignancies and Lymphoproliferative Disorders

Syndrome [1,2] | Gene | Inheritance | Associated Hematologic Malignancies | Clinical Characteristics | Standard Age at HM Presentation
Li-Fraumeni syndrome | TP53 | AD | Familial ALL (hypodiploid) | Young-onset solid tumors (breast, sarcoma) | Wide age range
IKAROS | IKZF1 | AD | ALL | Immunodeficiency | Childhood
Familial B-cell ALL | PAX5 | AD | ALL | None | Childhood
Bloom syndrome | BLM | AR | MDS/AML | Congenital malformations | Presents more often in childhood than in adulthood
DNA repair disorders | BRCA1/BRCA2, CHEK2 | AD | Lymphoid and myeloid malignancies | Solid tumors | Presents more often in adulthood than in childhood
Ataxia telangiectasia | ATM | AR, X-linked | Lymphoma, ALL | Congenital malformations, many other malignancies | Childhood
Xeroderma pigmentosum | XR | AD | Lymphoma, ALL, AML | Congenital malformations, melanoma and nonmelanoma skin cancers | Adolescents and young adults
Nijmegen breakage syndrome | NBS1 | AR | NHL, ALL | Congenital malformations | Presents more often in childhood than in adulthood
Ligase IV deficiency | Lig4 | AR | Lymphoma, lymphatic leukemia, MDS | Congenital malformations | Presents more often in childhood than in adulthood
RECQL4 disease | RECQL4 | AR | Lymphoma, lymphatic leukemia
Mismatch repair deficiency (Lynch syndrome, constitutional mismatch repair deficiency) | MLH1, MSH2, MSH6, PMS2, EPCAM | AD, AR [2] | Lymphoma, lymphatic leukemia | Many other malignancies | Presents more often in adulthood than in childhood
Familial CLL | POT1 | AD | CLL | Solid tumors (brain, melanoma, cardiac myxomas) | Presents more often in adulthood than in childhood

AD = autosomal dominant; ALL = acute lymphoblastic leukemia; AML = acute myeloid leukemia; AR = autosomal recessive; CLL = chronic lymphocytic leukemia; HHM = hereditary hematologic malignancies; MDS = myelodysplastic syndrome.

### References

Arber DA, Orazi A, Hasserjian RP, et al.: International Consensus Classification of Myeloid Neoplasms and Acute Leukemias: integrating morphologic, clinical, and genomic data. Blood 140 (11): 1200-1228, 2022.35767897
Döhner H, Wei AH, Appelbaum FR, et al.: Diagnosis and management of AML in adults: 2022 recommendations from an international expert panel on behalf of the ELN. Blood 140 (12): 1345-1377, 2022.35797463
Bluteau D, Masliah-Planchon J, Clairmont C, et al.: Biallelic inactivation of REV7 is associated with Fanconi anemia. J Clin Invest 126 (9): 3580-4, 2016.27500492
Park JY, Virts EL, Jankowska A, et al.: Complementation of hypersensitivity to DNA interstrand crosslinking agents demonstrates that XRCC2 is a Fanconi anaemia gene. J Med Genet 53 (10): 672-680, 2016.27208205
Mirabello L, Khincha PP, Ellis SR, et al.: Novel and known ribosomal causes of Diamond-Blackfan anaemia identified through comprehensive genomic characterisation. J Med Genet 54 (6): 417-425, 2017.28280134
O'Donohue MF, Da Costa L, Lezzerini M, et al.: HEATR3 variants impair nuclear import of uL18 (RPL5) and drive Diamond-Blackfan anemia. Blood 139 (21): 3111-3126, 2022.35213692
Toufektchan E, Lejour V, Durand R, et al.: Germline mutation of MDM4, a major p53 regulator, in a familial syndrome of defective telomere maintenance. Sci Adv 6 (15): eaay3511, 2020.32300648
Kermasson L, Churikov D, Awad A, et al.: Inherited human Apollo deficiency causes severe bone marrow failure and developmental defects. Blood 139 (16): 2427-2440, 2022.35007328
Sahoo SS, Kozyra EJ, Wlodarski MW: Germline predisposition in myeloid neoplasms: Unique genetic and clinical features of GATA2 deficiency and SAMD9/SAMD9L syndromes. Best Pract Res Clin Haematol 33 (3): 101197, 2020.33038986
Hakkarainen M, Kaaja I, Douglas SPM, et al.: The clinical picture of ERCC6L2 disease: from bone marrow failure to acute leukemia. Blood 141 (23): 2853-2866, 2023.36952636

## Latest Updates to This Summary (08/13/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This is a new summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of hereditary hematologic malignancies. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Genetics of Hereditary Hematologic Malignancies are:

- Julia Cooper, MS, CGC (Ohio State University)
- Courtney DiNardo, MD, MSC (University of Texas, M.D. Anderson Cancer Center)
- Marcin Wlodarski, MD, PhD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Genetics of Hereditary Hematologic Malignancies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/hereditary-hematologic-malignancies. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).